# Childhood Craniopharyngioma (PDQ®)

Patient Version

This PDQ cancer information summary has current information about the treatment of childhood craniopharyngioma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly, and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board.

## What is childhood craniopharyngioma?

Childhood craniopharyngioma is a rare tumor usually found near the pituitary gland (a pea-sized organ at the bottom of the brain that controls other glands) and the hypothalamus (a small cone-shaped organ connected to the pituitary gland by nerves). Craniopharyngiomas can occur at any age but are most often diagnosed in children aged 5 to 14 years and older adults. They are rare in children younger than 2.

Craniopharyngiomas are rare brain tumors that usually form near the pituitary gland and the hypothalamus. They are benign (not cancer) and do not spread to other parts of the brain or to other parts of the body. However, they may grow and press on nearby parts of the brain, including the pituitary gland, optic chiasm, and optic nerve. Craniopharyngiomas usually occur in children and young adults.

Drawing of the inside of the brain showing where craniopharyngiomas may form. A pullout shows a tumor between the hypothalamus and the optic chiasm. Also shown is the optic nerve, the pituitary gland, and the sphenoid sinus.

Craniopharyngiomas are usually part solid mass and part fluid-filled cyst. They are not cancer and do not spread to other parts of the brain or other parts of the body. However, they can grow and press on nearby parts of the brain, such as the pituitary gland. Or they may press on other areas, such as:

- the optic chiasm
- the optic nerves
- the fluid-filled spaces in the brain

Craniopharyngiomas may affect many brain functions, including hormone production, growth, and vision. Treatments help stop the tumor from pushing on other areas of the brain.

## Causes and risk factors for childhood craniopharyngioma

Craniopharyngioma is caused by certain changes to the way the brain cells function, especially how they grow and divide into new cells. Often, the exact cause of these changes is unknown.

There are no known risk factors for childhood craniopharyngioma.

## Symptoms of childhood craniopharyngioma

The symptoms of childhood craniopharyngioma depend on where the tumor grows in the brain. It's important to check with your child's doctor if your child has:

- headaches, including morning headache or headache that goes away after vomiting
- vision changes
- nausea and vomiting
- loss of balance or trouble walking
- unusual sleepiness or change in energy level
- changes in personality or behavior
- an increase in thirst or urination
- a short stature or slow growth
- weight gain
- hearing loss
- early or late puberty

These symptoms may be caused by problems other than craniopharyngioma. The only way to know is for your child to see a doctor.

Some symptoms caused by the tumor may continue for months or years after treatment. It is important to talk with your child's doctors about problems that may continue after treatment.

## Tests to diagnose childhood craniopharyngioma

If your child has symptoms that suggest a craniopharyngioma, the doctor will need to find out if they are due to a tumor or another problem. The doctor will ask when the symptoms started and how often your child has been having them. They will also ask about your child's personal and family medical history and do a physical exam, including a neurologic exam. Depending on these results, they may recommend other tests. If your child is diagnosed with craniopharyngioma, the results of these tests will help you and your child's doctor plan treatment.

The tests to diagnose craniopharyngioma may include:

### Visual field exam

A visual field exam checks a person’s field of vision (the total area in which objects can be seen). This test measures both central vision (how much a person can see when looking straight ahead) and peripheral vision (how much a person can see in all other directions while staring straight ahead). Any loss of vision may be a sign of a tumor that has damaged or pressed on the parts of the brain that affect eyesight.

### CT scan (CAT scan)

CT scan uses a computer linked to an x-ray machine to make a series of detailed pictures of areas inside the body. The pictures are taken from different angles and are used to create 3-D views of tissues and organs. A dye may be injected into a vein or swallowed to help the organs or tissues show up more clearly. This procedure is also called computed tomography, computerized tomography, or computerized axial tomography. Learn more about Computed Tomography (CT) Scans and Cancer (https://www.cancer.gov/about-cancer/diagnosis-staging/ct-scans-fact-sheet).

### Magnetic resonance imaging (MRI) with gadolinium

MRI uses a magnet, radio waves, and a computer to make a series of detailed pictures of areas inside the body, such as the brain and the spine. A substance called gadolinium is injected into a vein. The gadolinium collects around the tumor cells so they show up brighter in the picture. This procedure is also called nuclear magnetic resonance imaging (NMRI).

### Blood hormone studies

Blood hormone studies use a blood sample to measure the amounts of certain hormones released into the blood by organs and tissues in the body. If the amount of a hormone is higher or lower than normal, it can be a sign of disease in the organ or tissue that makes it. For craniopharyngioma, the blood may be checked for unusual levels of thyroid-stimulating hormone (TSH) or adrenocorticotropic hormone (ACTH). These hormones are made by the pituitary gland.

### Biopsy

If the CT scan or MRI show there may be a brain tumor, your child will have a biopsy to remove a sample of the tumor.

Types of biopsy that may be used to take the sample of tissue include:

- Open biopsy: A surgeon inserts a hollow needle through a hole in the skull into the brain.
- Computer-guided needle biopsy: A surgeon inserts a hollow needle guided by a computer through a small hole in the skull into the brain.
- Transsphenoidal biopsy: The surgeon inserts instruments through the nose and sphenoid bone (a butterfly-shaped bone at the base of the skull) and into the brain.

A pathologist views the tissue under a microscope to look for tumor cells. If they find tumor cells, the surgeon will remove as much tumor as safely possible during the same surgery.

### Immunohistochemistry

Immunohistochemistry uses antibodies to check for certain antigens (markers) in a sample of a patient’s cells or tissue. The antibodies are usually linked to an enzyme or a fluorescent dye. After the antibodies bind to a specific antigen in the tissue sample, the enzyme or dye is activated, and the antigen can then be seen under a microscope. This type of test is used to help diagnose cancer and to help tell one type of cancer from another type of cancer.

## Getting a second opinion

You may want to get a second opinion to confirm your child's diagnosis and treatment plan. If you seek a second opinion, you will need to get medical test results and reports from the first doctor to share with the second doctor. The second doctor will review the pathology report, slides, and scans. This doctor may agree with the first doctor, suggest changes to the treatment plan, or provide more information about your child's tumor.

To learn more about choosing a doctor and getting a second opinion, visit Finding Cancer Care (https://www.cancer.gov/about-cancer/managing-care/finding-cancer-care). You can contact NCI's Cancer Information Service (https://www.cancer.gov/contact) via chat, email, or phone (both in English and Spanish) for help finding a doctor or hospital that can provide a second opinion. For questions you might want to ask at your child's appointments, visit Questions to Ask Your Doctor about Cancer (https://www.cancer.gov/about-cancer/coping/questions).

## Types of treatment for childhood craniopharyngioma

### Who treats children with craniopharyngioma?

A pediatric oncologist, a doctor who specializes in treating children with cancer, oversees treatment for childhood craniopharyngioma. The pediatric oncologist works with other health care providers who are experts in treating children with brain tumors and who specialize in certain areas of medicine. Other specialists may include:

- pediatrician
- neurosurgeon
- radiation oncologist
- neurologist
- endocrinologist
- ophthalmologist
- rehabilitation specialist
- psychologist
- social worker
- nurse specialist

There are different types of treatment for children and adolescents with craniopharyngioma. Although craniopharyngioma is not cancer, treatment is often similar to cancer treatment and may include surgery, radiation therapy, and other approaches. You and your child's care team will work together to decide treatment. Many factors will be considered, such as your child's age and overall health, where the tumor is located and whether it has spread into nearby tissue, and the possible side effects and late effects of treatment.

Your child's treatment plan will include information about the tumor, the goals of treatment, treatment options, and the possible side effects. It will be helpful to talk with your child's care team before treatment begins about what to expect. For help every step of the way, visit our booklet, Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

Types of treatment your child might have include:

### Surgery

The type of surgery your child will have depends on the size of the tumor, where it is in the brain, and whether it has grown into nearby tissue in a finger-like way. It also depends on expected late effects that may occur after surgery.

The types of surgery that may be used to remove the tumor that can be seen with the eye include:

- Transsphenoidal surgery is a type of surgery in which a surgeon inserts instruments into the brain by going through a cut made under the upper lip or at the bottom of the nose between the nostrils. Then they go through the sphenoid bone (a butterfly-shaped bone at the base of the skull) to reach the tumor near the pituitary gland and hypothalamus.
  Transsphenoidal surgery. An endoscope and a curette are inserted through the nose and sphenoid sinus to remove the tumor.
  Transsphenoidal surgery; drawing shows an endoscope and a curette inserted through the nose and sphenoid sinus to remove cancer from the pituitary gland. The sphenoid bone is also shown.
- A craniotomy is surgery to remove the tumor through an opening made in the skull.
  Craniotomy. An opening is made in the skull and a piece of the skull is removed to show part of the brain.
  Drawing of a craniotomy showing a section of the scalp that has been pulled back to remove a piece of the skull; the dura covering the brain has been opened to expose the brain. The layer of muscle under the scalp is also shown.

To help make a diagnosis, sometimes the surgeon will remove only part of the tumor. If a tumor is near the pituitary gland or hypothalamus, it will not be removed. Leaving the tumor helps reduce serious side effects from the surgery.

Sometimes, the surgeon will remove all of the tumor that they can see and no further treatment is needed. At other times, they may not be able to remove the tumor because it is growing into or pressing on nearby organs.

### Surgery for cysts

If your child's tumor is mostly a fluid-filled cyst, they may have surgery to drain it. Draining it lowers the pressure in the brain and relieves symptoms.

A surgery called a partial resection can be used to remove fluid from cystic craniopharyngiomas. Or a thin tube called a catheter can be inserted into the cyst, and a small container placed under the skin. The fluid drains into the container and is later removed.

Sometimes, after the cyst is drained, a drug is put through the catheter into the cyst. This causes the inside wall of the cyst to scar and stops the cyst from making fluid. Or it can slow down how long it takes for the fluid to build up again. Surgery to remove the tumor or radiation therapy may be done after the cyst is drained.

### Radiation therapy

Radiation therapy uses high-energy x-rays or other types of radiation to kill tumor cells or keep them from growing. It is often given after surgery to kill any tumor that is left in the brain.

Both external radiation therapy and internal radiation therapy (also called brachytherapy) are used to treat craniopharyngiomas.

- External radiation therapy uses a machine outside the body to send radiation toward the area of the body with the tumor.
- Internal radiation therapy uses a radioactive substance sealed in needles, seeds, wires, or catheters that are placed directly into or near the tumor.

Radiation therapy to the brain can affect growth and development in young children, so ways of giving radiation therapy that have fewer side effects are often used. These include:

- Stereotactic radiosurgery may be used for very small craniopharyngiomas at the base of the brain. For this treatment, a rigid head frame is attached to the skull to keep the head still during the treatment. Then, a machine aims a single large dose of radiation directly at the tumor. This procedure is a type of radiation therapy and does not involve surgery. It is also called stereotaxic radiosurgery, radiosurgery, and radiation surgery.
- Intracavitary radiation therapy is a type of internal radiation therapy that may be used in tumors that are part solid mass and part fluid-filled cyst. For this treatment, radioactive material is placed inside the tumor. This type of radiation therapy causes less damage to the nearby hypothalamus and optic nerves.
- Intensity-modulated photon therapy is a type of radiation therapy that uses x-rays or gamma rays that come from a special machine called a linear accelerator (linac) to kill tumor cells. A computer is used to target the exact shape and location of the tumor. Then thin beams of photons of different strengths are aimed at the tumor from many angles. This type of 3-dimensional radiation therapy may cause less damage to healthy tissue in the brain and other parts of the body.
- Proton-beam radiation therapy is a type of radiation therapy that uses streams of protons (tiny particles with a positive charge) to kill tumor cells. This treatment can reduce the amount of radiation damage to healthy tissue near a tumor.

Learn more about Radiation Therapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/radiation-therapy).

### Chemotherapy

Chemotherapy (also called chemo) uses drugs to stop the growth of tumor cells. Chemotherapy either kills the tumor cells or stops them from dividing.

Chemotherapy can be placed directly into a cavity, such as a cyst. This way of giving chemotherapy is intracavitary chemotherapy. Bleomycin (https://www.cancer.gov/about-cancer/treatment/drugs/bleomycin) is a type of chemotherapy that can be placed directly into a cystic craniopharyngioma.

Learn more about Chemotherapy to Treat Cancer (https://www.cancer.gov/about-cancer/treatment/types/chemotherapy).

### Observation

Observation means that your child's condition is closely watched without receiving treatment until symptoms appear or change.

### Clinical trials

For some children, joining a clinical trial may be an option. There are different types of clinical trials for childhood cancer. For example, a treatment trial tests new treatments or new ways of using current treatments. Supportive care and palliative care trials look at ways to improve quality of life, especially for those who have side effects from cancer and its treatment.

You can use the clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials accepting participants. The search allows you to filter trials based on the type of cancer, your child's age, and where the trials are being done. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

Learn more about clinical trials, including how to find and join one, at Clinical Trials Information for Patients and Caregivers (https://www.cancer.gov/research/participate/clinical-trials).

### Treatment of newly diagnosed childhood craniopharyngioma

Treatment of newly diagnosed childhood craniopharyngioma may include:

- complete removal of the tumor with surgery with or without radiation therapy
- partial removal of the tumor with surgery followed by radiation therapy
- cyst drainage, followed by observation, radiation therapy, or surgery
- brachytherapy or chemotherapy placed directly in the cyst or tumor

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### Treatment of progressive or recurrent childhood craniopharyngioma

Treatment options for progressive or recurrent childhood craniopharyngioma depend on the type of treatment that your child received when the tumor was first diagnosed and your child's needs.

Treatment may include:

- surgery
- external-beam radiation therapy
- brachytherapy or intracavitary chemotherapy
- observation

Use our clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search) to find NCI-supported cancer clinical trials that are accepting patients. You can search for trials based on the type of cancer, the age of the patient, and where the trials are being done. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Prognostic factors for childhood craniopharyngioma

If your child has been diagnosed with craniopharyngioma, you likely have questions about how serious the tumor is and your child's chances of survival. The likely outcome or course of a disease is called prognosis.

The prognosis depends on:

- the size of the tumor
- where the tumor is in the brain
- whether there are tumor cells left after surgery
- your child's age
- side effects that may occur months or years after treatment
- whether the tumor has just been diagnosed or has recurred (come back)

No two people are alike, and responses to treatment can vary greatly. While the prognosis for childhood craniopharyngioma is generally good, the tumor often comes back after surgery. Your child's treatment team is in the best position to talk with you about your child's prognosis.

## Side effects and late effects of treatment

Cancer treatments used for craniopharyngioma can cause side effects. Which side effects your child might have depends on the type of treatment they receive, the dose, and how their body reacts. Talk with your child's treatment team about which side effects to look for and ways to manage them.

To learn more about side effects that begin during treatment for cancer, visit Side Effects (https://www.cancer.gov/about-cancer/treatment/side-effects).

Problems from treatment that begin 6 months or later after treatment and continue for months or years are called late effects. Late effects of treatment may include:

- seizures
- bone and muscle growth and development
- behavior problems
- changes in mood, feelings, thinking, learning, or memory
- second cancers (new types of cancer)

Serious physical problems may occur if the pituitary gland, hypothalamus, optic nerves, or carotid artery are affected during surgery or radiation therapy. These problems include:

- obesity
- metabolic syndrome, including fatty liver disease not caused by drinking alcohol
- vision problems, including blindness
- blood vessel problems or stroke
- loss of the ability to make certain hormones

Some late effects may be treated or controlled. Your child may need life-long hormone replacement therapy with several medicines. It is important to talk with your child's doctors about the effects treatment can have on your child. Learn more about Late Effects of Treatment for Childhood Cancer.

## Follow-up care

Some of the tests that were done to diagnose the disease or decide how to treat it may be repeated. Some tests will be repeated in order to see how well the treatment is working. Decisions about whether to continue, change, or stop treatment may be based on the results of these tests.

Some of the tests will continue to be done from time to time after treatment has ended. The results of these tests can show if your child's condition has changed. These tests are sometimes called follow-up tests or check-ups.

After treatment, follow-up testing with MRI will be done for several years to check if the tumor has come back.

## Coping with your child's diagnosis

When your child has a tumor, every member of the family needs support. Taking care of yourself during this difficult time is important. Reach out to your child’s treatment team and to people in your family and community for support. To learn more, visit Support for Families When a Child Has Cancer (https://www.cancer.gov/about-cancer/coping/caregiver-support/parents) and the booklet Children with Cancer: A Guide for Parents (https://www.cancer.gov/publications/patient-education/guide-for-parents).

## Related resources

For more childhood cancer information and other general cancer resources, visit:

- Pediatric Brain Tumor Consortium (PBTC) (https://www.pbtc.org/)
- About Cancer (https://www.cancer.gov/about-cancer)
- Childhood Cancers (https://www.cancer.gov/types/childhood-cancers)
- CureSearch for Children's Cancer (http://www.curesearch.org/)
- Adolescents and Young Adults with Cancer (https://www.cancer.gov/types/aya)
- Cancer in Children and Adolescents (https://www.cancer.gov/types/childhood-cancers/child-adolescent-cancers-fact-sheet)
- For Survivors, Caregivers, and Advocates (https://cancercontrol.cancer.gov/ocs/resources/survivors-caregivers-advocates)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about the treatment of childhood craniopharyngioma. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Pediatric Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/pediatric-treatment).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Pediatric Treatment Editorial Board. PDQ Childhood Craniopharyngioma. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/brain/patient/child-cranio-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389237]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).